# Genetics of Renal Cell Carcinoma (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the genetics of renal cell carcinoma. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Inheritance and Risk of Renal Cell Carcinoma

Renal cell carcinoma (RCC) is commonly diagnosed in both men and women. In the United States in 2025, about 80,980 new cases of kidney cancer and renal pelvis cancer will occur, along with an estimated 14,510 deaths.[1] These cancers account for about 3.97% of all adult malignancies.[1] The male-to-female ratio is 1.9:1.[2] RCC is distinct from kidney cancer that involves the renal pelvis or renal medulla, and it only applies to cancer that forms in the lining of the kidney bed (i.e., in the renal tubules). This summary does not address non-RCCs of the kidney, including cancer of the renal pelvis or renal medulla. Genetic pathogenic variants have been identified as the cause of inherited cancer risk in some RCC-prone families; these pathogenic variants are estimated to account for only 5% to 8% of RCC cases overall.[3,4] It is likely that other undiscovered genes and background genetic factors contribute to the development of familial RCC along with nongenetic risk factors.

Studies of several sequencing cohorts have evaluated patients with RCC using genetic testing panels that included many genes not previously associated with hereditary RCC. Many of these cohorts reinforce that the rate of germline alterations in classic RCC genes aligns with prior estimates. These cohorts also show a high incidence of other pathogenic variants, some of which occurred in DNA repair genes. The rate of other pathogenic alterations ranged from 12.8% to 17.0%.[5-9] The incidence of other pathogenic alterations is higher than would be expected in the population. However, these cohorts are not population-based, and they are significantly enriched for cancer patients who have been recommended for germline testing.

A retrospective single-center study of patients with early-onset RCC (diagnosed before age 46 y), found that participants with clinical phenotypes suggestive of RCC-associated pathogenic variants—like bilateral or multifocal tumors, non–clear cell renal histology, and extra-renal primary cancers—had the highest yields on germline RCC panel testing.[10] There were 129 patients with clear cell RCC. A subset analysis of patients with unifocal, clear cell RCC did not reveal pathogenic variants on RCC genetic testing panels. Other studies have confirmed that individuals with bilateral or multifocal tumors were more likely to have a pathogenic variant in an RCC- or cancer-related gene.[11] However, 5% to 10% of individuals in these series had pathogenic variants in non-RCC–associated genes—primarily in DNA repair genes.[10,11] At this time, it is unclear if there is a causal relationship between RCC and these pathogenic alterations; the relationship requires additional study. It is plausible that these pathogenic variants increase RCC risk. However, RCC risk could also be elevated by other factors like an enriched population of high-risk individuals or overdetection of RCC from frequent scans in high-risk patients.

In contrast, several studies reported that the incidence of germline pathogenic variants is much lower (4.1% to 6.4%) in unselected individuals with RCC who underwent sequencing during a research study.[12,13] Most variants identified in these series were in genes classically associated with RCC. This finding suggests that the population studied may greatly influence the detection rate of pathogenic variants in cancer predisposition genes that are not typically associated with RCC.

RCC occurs in both sporadic and heritable forms. Four major RCC syndromes with autosomal dominant inheritance have been identified. PDQ summaries are available for each of these syndromes:

- Von Hippel-Lindau Disease (VHL).
- Hereditary Leiomyomatosis and Renal Cell Cancer (HLRCC).
- Hereditary Papillary Renal Carcinoma (HPRC).
- Birt-Hogg-Dubé Syndrome (BHD).

For more information about sporadic kidney cancer, see Renal Cell Cancer Treatment and Transitional Cell Cancer of the Renal Pelvis and Ureter Treatment.

### Natural History of Renal Cell Carcinoma

The natural history of each RCC syndrome is distinct and influenced by several factors, including histological features and underlying genetic alterations. Although it is useful to follow the predominant reported natural history of each syndrome, each affected individual must be evaluated and monitored for occasional individual variations. The individual prognosis depends on the characteristics of the renal tumor at the time of detection and intervention, which differs for each syndrome (VHL, HLRCC, HPRC, and BHD). Prognostic determinants at diagnosis include the stage of the RCC, whether the tumor is confined to the kidney, primary tumor size, Fuhrman nuclear grade, and multifocality.[14-16]

### Family History as a Risk Factor for Renal Cell Carcinoma

Kidney cancer and renal pelvis cancer account for about 3.97% of all adult malignancies in the United States.[1] Epidemiological studies of RCC suggest that a family history of RCC is a risk factor for the disease.[4,17,18] An analysis of individuals with RCCs diagnosed before the year 2000 in the Sweden Family-Cancer Database included all Swedes born since 1931 and their biological parents. The study observed that the risk of RCC was particularly high in the siblings of those with RCC. Siblings of individuals with RCC had a higher relative risk (RR) than parent-child pairs.[17] Further work from this database confirms that 3% of individuals with RCC had a first-degree relative (FDR) with RCC.[19] Risk may be higher in individuals who have multiple FDRs with RCC and in women. Another study examined all patients in Iceland who developed RCC between 1955 and 1999 (1,078 cases). Investigators used an extensive computerized database to perform a unique genealogical study that included more than 600,000 Icelandic individuals. Results revealed that nearly 60% of Icelandic patients with RCC had a FDR or a second-degree relative (SDR) with RCC. Siblings of patients with RCC had an estimated RR of 2.5.[4] In a Korean study, individuals who had FDRs with RCC had a 2.29-fold increased risk of RCC. Risk did not appear to differ whether the FDR was a mother, father, or a sibling.[20] Modifying factors like obesity and hyperglycemia may further increase RCC risk in this high-risk population. Another study evaluated 80,309 monozygotic twins and 123,382 same-sex dizygotic twins in Denmark, Finland, Norway, and Sweden.[18] This study found excess cancer risk in twins whose co-twin was diagnosed with cancer. The estimated cumulative risks were an absolute 5% higher (95% confidence interval [CI], 4%–6%) in dizygotic twins (37%; 95% CI, 36%–38%) and an absolute 14% higher (95% CI, 12%–16%) in monozygotic twins (46%; 95% CI, 44%–48%)—for those whose co-twin also developed cancer—than in the overall cohort (32%). Overall heritability of cancer, calculated by assessing the relative contribution of heredity versus shared environment, was estimated to be 33%. Kidney cancer heritability was estimated to be 38% (95% CI, 21%–55%). Shared environmental factors did not significantly contribute to overall risk.

Young age at RCC onset is also a clue that hereditary etiology is possible. Unlike sporadic RCC, which is generally diagnosed during the fifth to seventh decades of life, hereditary forms of RCC are generally diagnosed at an earlier age. In a review of more than 600 cases of hereditary RCC from the National Cancer Institute, the median age of RCC diagnosis was 37 years, with 70% of cases being diagnosed at age 46 years or younger.[3] This age is lower than the median age of RCC diagnosis in the general population, which is 64 years.[21] Heritable RCCs are often multifocal and bilateral. A retrospective analysis of 1,235 patients with RCC who underwent genetic testing revealed that 6.1% of this population had positive genetic test results, 75.5% had negative test results, and 18.4% had a variant of unknown significance. Young age at RCC diagnosis was the only variable associated with a positive test result.[8] Other series showed that patients with non-clear cell advanced RCC may have an enrichment for pathogenic variants when compared with patients who had clear cell RCC; however, current research data are limited.[5,22]

While there is much debate about the referral criteria for hereditary RCC genetic testing, the following organizations have offered some guidance:

- VHL Alliance (https://www.vhl.org/clinicians/suggested-referral-criteria-vhl-clinical-care-centers/).
- Kidney Cancer Research Network of Canada.[23]
- National Comprehensive Cancer Network.[24]

These guidelines acknowledge that the following criteria can prompt a referral to genetic counseling: early age of RCC onset, family history of RCC (≥1 FDR/SDR with RCC), bilateral or multifocal RCCs, and suspicious RCC histology. A consensus statement published by a group of kidney cancer experts provides additional guidance that may help providers identify patients who can be referred to genetic counseling.[25]

When evaluating patients at risk of hereditary kidney cancer, specific clinical features help determine which test is the most appropriate to order. Single gene tests are available during family variant testing or when there is only suspicion for one specific kidney cancer syndrome. The following panel tests are also available: 1) broad cancer genetic panels of up to 100 genes associated with cancer predisposition, and 2) renal cancer genetic panels with 15 to 20 genes that have strong associations with hereditary kidney cancer syndromes. Most of these panels conduct targeted sequencing of the exon with little coverage of the intron, except for splice-site variants. In the future, RNA testing may be useful to evaluate variants of unknown significance identified by DNA testing, to add additional support for pathogenicity. Whole genome sequencing (WGS) can be considered for rare cases with clinical suspicion that had negative panel testing. WGS may detect structural variants in introns that can contribute to cancer predisposition. In a series of over 1,300 unselected patients with RCC who underwent WGS, 6.9% of patients had germline pathogenic variants identified in cancer predisposition genes.[12]

### Other Risk Factors for Renal Cell Carcinoma

Studies of environmental and lifestyle factors contributing to the risk of RCC focus almost exclusively on sporadic (i.e., nonhereditary) RCC. Smoking, hypertension, and obesity are the major environmental and lifestyle risk factors associated with RCC.[26] In addition, workers who were reportedly exposed to the environmental carcinogen trichloroethylene developed sporadic clear cell RCC, presumably resulting from somatic variants in the VHL gene.[27] Dietary intake of vegetables and fruits has been inversely associated with RCC. Greater intake of red meat and milk products have been associated with increased RCC risk, although not consistently.[28]

### References

American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.
DeVita VT Jr, Lawrence TS, Rosenberg SA, et al., eds.: DeVita, Hellman, and Rosenberg’s Cancer: Principles & Practice of Oncology. 11th ed. Wolters Kluwer, 2019.
Shuch B, Vourganti S, Ricketts CJ, et al.: Defining early-onset kidney cancer: implications for germline and somatic mutation testing and clinical management. J Clin Oncol 32 (5): 431-7, 2014.24378414
Gudbjartsson T, Jónasdóttir TJ, Thoroddsen A, et al.: A population-based familial aggregation analysis indicates genetic contribution in a majority of renal cell carcinomas. Int J Cancer 100 (4): 476-9, 2002.12115533
Carlo MI, Mukherjee S, Mandelker D, et al.: Prevalence of Germline Mutations in Cancer Susceptibility Genes in Patients With Advanced Renal Cell Carcinoma. JAMA Oncol 4 (9): 1228-1235, 2018.29978187
Hartman TR, Demidova EV, Lesh RW, et al.: Prevalence of pathogenic variants in DNA damage response and repair genes in patients undergoing cancer risk assessment and reporting a personal history of early-onset renal cancer. Sci Rep 10 (1): 13518, 2020.32782288
Abou Alaiwi S, Nassar AH, Adib E, et al.: Trans-ethnic variation in germline variants of patients with renal cell carcinoma. Cell Rep 34 (13): 108926, 2021.33789101
Nguyen KA, Syed JS, Espenschied CR, et al.: Advances in the diagnosis of hereditary kidney cancer: Initial results of a multigene panel test. Cancer 123 (22): 4363-4371, 2017.28787086
Smith PS, West H, Whitworth J, et al.: Pathogenic germline variants in patients with features of hereditary renal cell carcinoma: Evidence for further locus heterogeneity. Genes Chromosomes Cancer 60 (1): 5-16, 2021.32830346
Truong H, Sheikh R, Kotecha R, et al.: Germline Variants Identified in Patients with Early-onset Renal Cell Carcinoma Referred for Germline Genetic Testing. Eur Urol Oncol 4 (6): 993-1000, 2021.34654685
Nguyen CB, Knaus C, Li J, et al.: Pathogenic Germline Mutational Landscape in Patients With Renal Cell Carcinoma and Associated Clinicopathologic Features. JCO Precis Oncol 7: e2300168, 2023.38127826
Yngvadottir B, Andreou A, Bassaganyas L, et al.: Frequency of pathogenic germline variants in cancer susceptibility genes in 1336 renal cell carcinoma cases. Hum Mol Genet 31 (17): 3001-3011, 2022.35441217
Sekine Y, Iwasaki Y, Aoi T, et al.: Different risk genes contribute to clear cell and non-clear cell renal cell carcinoma in 1532 Japanese patients and 5996 controls. Hum Mol Genet 31 (12): 1962-1969, 2022.35764097
Vira MA, Novakovic KR, Pinto PA, et al.: Genetic basis of kidney cancer: a model for developing molecular-targeted therapies. BJU Int 99 (5 Pt B): 1223-9, 2007.17441915
Choyke PL, Glenn GM, Walther MM, et al.: Hereditary renal cancers. Radiology 226 (1): 33-46, 2003.12511666
Zbar B, Glenn G, Merino M, et al.: Familial renal carcinoma: clinical evaluation, clinical subtypes and risk of renal carcinoma development. J Urol 177 (2): 461-5; discussion 465, 2007.17222609
Hemminki K, Li X: Familial risks of cancer as a guide to gene identification and mode of inheritance. Int J Cancer 110 (2): 291-4, 2004.15069696
Mucci LA, Hjelmborg JB, Harris JR, et al.: Familial Risk and Heritability of Cancer Among Twins in Nordic Countries. JAMA 315 (1): 68-76, 2016.26746459
Jakobsson RG, Nasic S, Bratt O, et al.: Family History and Risk of Renal Cell Carcinoma: A National Multiregister Case-Control Study. J Urol 211 (1): 71-79, 2024.37862613
Lee SW, Kim HJ, Kazmi SZ, et al.: Familial Risk of Renal Cell Cancer and Interaction with Obesity and Hyperglycemia: A Population-Based Study. J Urol 208 (2): 251-258, 2022.35298291
National Cancer Institute: SEER Stat Fact Sheets: Kidney and Renal Pelvis Cancer. Bethesda, Md: National Cancer Institute. Available online (https://seer.cancer.gov/statfacts/html/kidrp.html). Last accessed February 17, 2025.
Santos M, Lanillos J, Roldan-Romero JM, et al.: Prevalence of pathogenic germline variants in patients with metastatic renal cell carcinoma. Genet Med 23 (4): 698-704, 2021.33442023
Reaume MN, Graham GE, Tomiak E, et al.: Canadian guideline on genetic screening for hereditary renal cell cancers. Can Urol Assoc J 7 (9-10): 319-23, 2013 Sep-Oct.24319509
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Kidney Cancer. Version 3.2023. Plymouth Meeting, Pa: National Comprehensive Cancer Network, 2022. Available online with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/kidney.pdf) Last accessed September 30, 2024.
Bratslavsky G, Mendhiratta N, Daneshvar M, et al.: Genetic risk assessment for hereditary renal cell carcinoma: Clinical consensus statement. Cancer 127 (21): 3957-3966, 2021.34343338
McLaughlin JK, Lipworth L: Epidemiologic aspects of renal cell cancer. Semin Oncol 27 (2): 115-23, 2000.10768591
Brauch H, Weirich G, Hornauer MA, et al.: Trichloroethylene exposure and specific somatic mutations in patients with renal cell carcinoma. J Natl Cancer Inst 91 (10): 854-61, 1999.10340905
Chow WH, Devesa SS: Contemporary epidemiology of renal cell cancer. Cancer J 14 (5): 288-301, 2008 Sep-Oct.18836333

## Major Heritable Renal Cell Carcinoma Syndromes

There are four major hereditary renal cell carcinoma (RCC) syndromes. These syndromes are summarized in detail in the following PDQ summaries and in Table 1 below:

- Von Hippel-Lindau Disease (VHL).
- Hereditary Leiomyomatosis and Renal Cell Cancer (HLRCC).
- Hereditary Papillary Renal Carcinoma (HPRC).
- Birt-Hogg-Dubé Syndrome (BHD).

Table 1. Hereditary Renal Cell Cancer (RCC) Syndromes and Susceptibility Genes

Syndrome (Inheritance Pattern) | Gene Locus, Gene Type (Protein) | Renal Tumor Pathology | Cumulative Cancer Risk | Nonrenal Tumors and Associated Abnormalities
Von Hippel-Lindau disease (VHL) (AD) [1,2] | VHL 3p26, tumor suppressor (pVHL) | ccRCC (multifocal) | 24%–45% | CNS hemangioblastoma, retinal hemangioblastomas, PHEO, pancreatic neuroendocrine tumor, endolymphatic sac tumor, cystadenoma of the pancreas, the epididymis, and the broad ligament
Hereditary leiomyomatosis and renal cell cancer (HLRCC) (AD) [3-6] | FH 1q42.1, tumor suppressor (fumarate hydratase) | HLRCC-associated RCC | Up to 32% | Cutaneous leiomyomas, uterine leiomyomas (fibroids)
Hereditary papillary renal carcinoma (HPRC) (AD) [7,8] | MET 7q34, proto-oncogene (hepatocyte growth factor receptor) | Papillary RCC (formerly known as type 1 papillary RCC) | Approaching 100% | None known
Birt-Hogg-Dubé syndrome (BHD) (AD) [9-12] | FLCN 17p11.2, tumor suppressor (folliculin) | Hybrid oncocytic, chromophobe, oncocytoma, papillary, clear cell | 15%–30% | Cutaneous: fibrofolliculomas/ trichodiscomas
Birt-Hogg-Dubé syndrome (BHD) (AD) [9-12] | FLCN 17p11.2, tumor suppressor (folliculin) | Hybrid oncocytic, chromophobe, oncocytoma, papillary, clear cell | 15%–30% | Pulmonary: lung cysts, spontaneous pneumothoraces

AD = autosomal dominant; ccRCC = clear cell renal cell carcinoma; CNS = central nervous system; PHEO = pheochromocytoma.

These major RCC syndromes are transmitted via an autosomal dominant mode of inheritance. This means that the altered gene is present in one of the parents and that the chances of transmitting this gene and the disease to the offspring is 50% for each pregnancy. Genetic tests performed in Clinical Laboratory Improvement Amendments (CLIA)-certified laboratories are available for the genes associated with VHL, HLRCC, HPRC, and BHD. Genetic counseling is a prerequisite for genetic testing. For more information, see Cancer Genetics Risk Assessment and Counseling.

### References

Choyke PL, Glenn GM, Walther MM, et al.: von Hippel-Lindau disease: genetic, clinical, and imaging features. Radiology 194 (3): 629-42, 1995.7862955
Lonser RR, Glenn GM, Walther M, et al.: von Hippel-Lindau disease. Lancet 361 (9374): 2059-67, 2003.12814730
Launonen V, Vierimaa O, Kiuru M, et al.: Inherited susceptibility to uterine leiomyomas and renal cell cancer. Proc Natl Acad Sci U S A 98 (6): 3387-92, 2001.11248088
Alam NA, Olpin S, Leigh IM: Fumarate hydratase mutations and predisposition to cutaneous leiomyomas, uterine leiomyomas and renal cancer. Br J Dermatol 153 (1): 11-7, 2005.16029320
Toro JR, Nickerson ML, Wei MH, et al.: Mutations in the fumarate hydratase gene cause hereditary leiomyomatosis and renal cell cancer in families in North America. Am J Hum Genet 73 (1): 95-106, 2003.12772087 22696721
Wei MH, Toure O, Glenn GM, et al.: Novel mutations in FH and expansion of the spectrum of phenotypes expressed in families with hereditary leiomyomatosis and renal cell cancer. J Med Genet 43 (1): 18-27, 2006.15937070
Schmidt L, Duh FM, Chen F, et al.: Germline and somatic mutations in the tyrosine kinase domain of the MET proto-oncogene in papillary renal carcinomas. Nat Genet 16 (1): 68-73, 1997.9140397
Schmidt LS, Nickerson ML, Angeloni D, et al.: Early onset hereditary papillary renal carcinoma: germline missense mutations in the tyrosine kinase domain of the met proto-oncogene. J Urol 172 (4 Pt 1): 1256-61, 2004.15371818
Toro JR, Wei MH, Glenn GM, et al.: BHD mutations, clinical and molecular genetic investigations of Birt-Hogg-Dubé syndrome: a new series of 50 families and a review of published reports. J Med Genet 45 (6): 321-31, 2008.18234728
Toro JR, Glenn G, Duray P, et al.: Birt-Hogg-Dubé syndrome: a novel marker of kidney neoplasia. Arch Dermatol 135 (10): 1195-202, 1999.10522666
Zbar B, Alvord WG, Glenn G, et al.: Risk of renal and colonic neoplasms and spontaneous pneumothorax in the Birt-Hogg-Dubé syndrome. Cancer Epidemiol Biomarkers Prev 11 (4): 393-400, 2002.11927500
Pavlovich CP, Walther MM, Eyler RA, et al.: Renal tumors in the Birt-Hogg-Dubé syndrome. Am J Surg Pathol 26 (12): 1542-52, 2002.12459621 22346902

## Latest Updates to This Summary (05/09/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Inheritance and Risk of Renal Cell Carcinoma

Updated statistics with estimated new cancer cases and deaths for 2025 (cited American Cancer Society as reference 1).

Family History as a Risk Factor for Renal Cell Carcinoma

Added American Cancer Society as reference 1.

This summary is written and maintained by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the genetics of renal cell carcinoma. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Genetics of Renal Cell Carcinoma are:

- Alexandra Perez Lebensohn, MS, CGC (National Cancer Institute)
- Brian Matthew Shuch, MD (UCLA Health)
- Ramaprasad Srinivasan, MD, PhD (National Cancer Institute)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Cancer Genetics Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Cancer Genetics Editorial Board. PDQ Genetics of Renal Cell Carcinoma. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/kidney/hp/renal-cell-carcinoma-genetics. Accessed <MM/DD/YYYY>. [PMID: 26389510]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).